# Hot Flashes and Night Sweats (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of hot flashes and night sweats. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Hot flashes and night sweats are common in cancer survivors, particularly women, but they can also occur in men. Pathophysiological mechanisms are complex. Treatment options are broad-based and include hormonal agents, nonhormonal pharmacotherapies, and diverse integrative medicine modalities.[1]

Hot flashes, also called hot flushes, occur in approximately two-thirds of postmenopausal women with a history of breast cancer and are associated with night sweats in 44% of these women.[2,3] The severity of hot flashes in patients with breast cancer has been associated with sleep difficulty, higher pain severity, and poor psychological functioning.[4] In premenopausal breast cancer survivors, vasomotor symptoms—including hot flashes and night sweats—have been associated with depression, an effect that may be mediated by sleep disturbance.[5] For most patients with breast cancer or prostate cancer, hot flash intensity is moderate to severe. Sweating can be part of the hot flash complex that characterizes the vasomotor instability of menopause. Physiologically, sweating mediates core body temperature by producing transdermal evaporative heat loss.[6,7] Hot flashes accompanied by sweating that occur during the sleeping hours are often called night sweats.[8]

Approximately 20% of women without breast cancer seek medical treatment for postmenopausal symptoms, including symptoms related to vasomotor instability.[9] Vasomotor symptoms resolve spontaneously in most patients in this population, with only 20% of affected women reporting significant hot flashes 4 years after the last menses.[9] There are no comparable data for women with metastatic breast cancer. Three-quarters of men with locally advanced or metastatic prostate cancer treated with medical or surgical orchiectomy experience hot flashes.[10]

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Dalal S, Zhukovsky DS: Pathophysiology and management of hot flashes. J Support Oncol 4 (7): 315-20, 325, 2006 Jul-Aug.16892692
Couzi RJ, Helzlsouer KJ, Fetting JH: Prevalence of menopausal symptoms among women with a history of breast cancer and attitudes toward estrogen replacement therapy. J Clin Oncol 13 (11): 2737-44, 1995.7595732 96067231
Carpenter JS, Andrykowski MA, Cordova M, et al.: Hot flashes in postmenopausal women treated for breast carcinoma: prevalence, severity, correlates, management, and relation to quality of life. Cancer 82 (9): 1682-91, 1998.9576289 98235822
Chang HY, Jotwani AC, Lai YH, et al.: Hot flashes in breast cancer survivors: Frequency, severity and impact. Breast 27: 116-21, 2016.27065357
Accortt EE, Bower JE, Stanton AL, et al.: Depression and vasomotor symptoms in young breast cancer survivors: the mediating role of sleep disturbance. Arch Womens Ment Health 18 (3): 565-8, 2015.25597026
Boulant JA: Thermoregulation. In: Machowiak PA, ed.: Fever: Basic Mechanisms and Management. Raven Press, 1991, pp 1-22.
Dinarello CA, Bunn PA: Fever. Semin Oncol 24 (3): 288-98, 1997.9208885 97352490
8 Causes of Night Sweats. New York, NY: WebMD, 2024. Available online (https://www.webmd.com/menopause/guide/8-causes-of-night-sweats). Last accessed Jan. 15, 2025.
Johnson SR: Menopause and hormone replacement therapy. Med Clin North Am 82 (2): 297-320, 1998.9531927 98193078
Charig CR, Rundle JS: Flushing. Long-term side effect of orchiectomy in treatment of prostatic carcinoma. Urology 33 (3): 175-8, 1989.2465644 89147068

## Etiology

Causes of menopausal hot flashes include natural menopause, surgical menopause, or chemical menopause. In patients with cancer, chemical menopause may be caused by the following:

- Cytotoxic chemotherapy.
- Radiation therapy.
- Androgen treatment.

Causes of so-called male menopause include the following:

- Orchiectomy.
- Gonadotropin-releasing hormone use.
- Estrogen use.

Drug-associated causes of hot flashes and night sweats in men and women include use of the following:

- Tamoxifen.
- Aromatase inhibitors.
- Opioids.
- Tricyclic antidepressants.
- Steroids.

Women who are extensive metabolizers of tamoxifen related to CYP2D6 may have more severe hot flashes than women who are poor metabolizers;[1] however, conflicting data surround this topic.[2]

### References

Lynn Henry N, Rae JM, Li L, et al.: Association between CYP2D6 genotype and tamoxifen-induced hot flashes in a prospective cohort. Breast Cancer Res Treat 117 (3): 571-5, 2009.19153830
Jansen LE, Teft WA, Rose RV, et al.: CYP2D6 genotype and endoxifen plasma concentration do not predict hot flash severity during tamoxifen therapy. Breast Cancer Res Treat 171 (3): 701-708, 2018.29980881

## Primary Interventions

### Hormone Replacement Therapy

Estrogen replacement effectively controls hot flashes associated with biological or treatment-related postmenopausal states in women. The proposed mechanism of action of estrogen replacement therapy is that it ameliorates hot flashes by raising the core body temperature sweating threshold.[1][Level of evidence: I] However, many women have relative or absolute contraindications to estrogen replacement. Physicians and breast cancer survivors often think there is an increased risk of breast cancer recurrence or de novo breast malignancy with hormone replacement therapies and defer hormonal management of postmenopausal symptoms. Methodologically strong data evaluating the risk of breast cancer associated with hormone replacement therapy in healthy women have been minimal, despite strong basic science considerations suggesting the possibility of such a risk.[2]

The Women’s Health Initiative, a large, randomized, placebo-controlled trial of the risks and benefits of estrogen plus progestin in healthy postmenopausal women, was stopped prematurely in 2022 at a mean follow-up of 5.2 years (±1.3) because researchers found a 1.26-fold increased risk of breast cancer (95% confidence interval [CI], 1.00–1.59) in women receiving hormone replacement therapy. Tumors among women in the hormone replacement therapy group were slightly larger and more advanced than tumors among women in the placebo group, with a substantial and statistically significant rise in the percentage of abnormal mammograms at first annual screening. This rise might hinder breast cancer diagnosis and account for the later stage at diagnosis.[3,4][Level of evidence: I] These results are supported by a population-based case-control study suggesting a 1.7-fold increased risk of breast cancer (95% CI, 1.3–2.2) in women using combined hormone replacement therapy. The risk of invasive lobular carcinoma was increased 2.7-fold (95% CI, 1.7–4.3), the risk of invasive ductal carcinoma was increased 1.5-fold (95% CI, 1.1–2.0), and the risk of estrogen receptor–positive/progesterone receptor–positive breast cancer was increased 2.0-fold (95% CI, 1.5–2.7). The increased risk was highest for invasive lobular tumors and in women who used hormone replacement therapy for longer periods. The risk was not increased with the use of unopposed estrogen therapy.[5]

The limited data do not indicate an increased risk of breast cancer recurrence with single-agent estrogen use in patients with a history of breast cancer.[6,7] A series of double-blind, placebo-controlled trials suggested that low-dose megestrol acetate is a promising agent for hot flash management in this population.[8][Level of evidence: I]; [9][Level of evidence: II] Limited data suggest that brief cycles of intramuscular depot medroxyprogesterone acetate also play a role in the management of hot flashes.[10][Level of evidence: I] The risk associated with progestin use is unknown.[2]

Examples of hormone-based pharmacological treatments for vasomotor symptoms are summarized in Table 1.

Table 1. Hormone-Based Treatment of Vasomotor Symptoms

Drug Category | Medication | Dose | Comment | Reference
Estrogen | Example: 17-beta-estradiol | 0.5 mg PO q24h | Multiple routes available; consider use of estrogen/progestin combination products for women with intact uteri. | [11]; [12][Level of evidence: I]
Progestin | Megestrol acetate | 20 mg PO qd | Studied in men and women. | [8][Level of evidence: I]; [9][Level of evidence: III]
Progestin | Medroxyprogesterone | 400 mg IM x 1 | | [13][Level of evidence: I]; [14][Level of evidence: III]

IM = intramuscular; PO = by mouth; qd = every day.

### Other Pharmacological Interventions

Numerous nonestrogenic pharmacological treatments for hot flash management in women with a history of breast cancer and in some men who have undergone androgen deprivation therapy have been evaluated. Options with reported efficacy include the following: [15-17][Level of evidence: I]

- Androgens.
- Progestational agents.
- Gabapentin.
- Selective serotonin reuptake inhibitors (SSRIs).
- Selective serotonin norepinephrine inhibitors.
- Alpha adrenergic agonists (e.g., methyldopa, clonidine).
- Beta-blockers.

Inferior efficacy, lack of large definitive studies, and potential side effects limit the use of many of these agents.

Agents that have been found to be helpful in large, randomized, placebo-controlled clinical trials include the following: [15-17]

- Venlafaxine.
- Paroxetine.
- Citalopram.
- Fluoxetine.
- Gabapentin.
- Pregabalin.
- Clonidine.

Agents that confer a 55% to 60% reduction in hot flashes are venlafaxine extended release,[18] paroxetine controlled release [19,20][Level of evidence: I] or immediate release,[21] gabapentin,[22-25][Level of evidence: I]; [26][Level of evidence: II] and pregabalin.[27][Level of evidence: I] Other effective agents resulting in a reduction in hot flashes of approximately 50% include citalopram [28][Level of evidence: I] and fluoxetine.[29][Level of evidence: I] Clonidine, transdermal [30] or oral,[31][Level of evidence: I] can reduce hot flashes by approximately 40%.

One study compared the efficacy and patient preference of venlafaxine, 75 mg once daily, to gabapentin, 300 mg 3 times daily, for the reduction of hot flashes. Sixty-six women with a history of breast cancer were randomly assigned in an open-label fashion to receive venlafaxine or gabapentin for 4 weeks. After a 2-week washout period, they received the opposite treatment for an additional 4 weeks. Both treatments reduced hot flash scores (severity multiplied by frequency) by approximately 66%. However, significantly more women preferred venlafaxine to gabapentin (68% vs. 32%, respectively).[22]

A study using citalopram examined how much of a reduction in hot flashes was needed to have a positive impact on activities of daily living and general health-related quality of life.[32] The authors reported that hot flashes had to be reduced by at least 46% for women to report significant improvements in the degree of bother they experienced in daily activities.

In a randomized study of paroxetine versus placebo in postmenopausal survivors of gynecological cancer, paroxetine significantly reduced the severity and frequency of hot flashes and nighttime awakening attributed to vasomotor symptoms, with improvement in sleep duration.[20][Level of evidence: I]

Agents that have been evaluated in phase II trials but have not shown efficacy include bupropion,[33] aprepitant,[34] and desipramine.[35][Level of evidence: II] Interestingly, these agents do not primarily modulate serotonin. In addition, randomized clinical trials with sertraline have not provided convincing evidence of its efficacy in hot flash management.[36-38][Level of evidence: I]

Examples of nonhormonal pharmacological treatments for vasomotor symptoms are summarized in Table 2.

Table 2. Nonhormonal Treatment of Vasomotor Symptoms

Drug Category | Medication | Dose | Comment | Reference
Selective serotonin reuptake inhibitor | Citalopram | 10–20 mg PO q24h | Mixed efficacy results | [28][Level of evidence: I]
Selective serotonin reuptake inhibitor | Escitalopram | 10–20 mg PO q24h | Studied in a nononcology patient population | [39,40][Level of evidence: I]
Selective serotonin reuptake inhibitor | Fluoxetine | 20 mg PO q24h | | [29][Level of evidence: I]
Selective serotonin reuptake inhibitor | Paroxetine | IR: 10–20 mg PO q24h | Brisdelle branded product for VMS 7.5 mg PO qhs | [19-21][Level of evidence: I]
Selective serotonin reuptake inhibitor | Paroxetine | CR: 12.5–25 mg PO q24h | Brisdelle branded product for VMS 7.5 mg PO qhs | [19-21][Level of evidence: I]
Selective serotonin reuptake inhibitor | Sertraline | 50 mg PO q24h | Benefit seen over placebo after crossover, but not vs. baseline VMS | [36][Level of evidence: I]
Serotonin/norepinephrine reuptake inhibitor | Venlafaxine | 37.5–150 mg/d (daily dosing for ER or in 2–3 divided doses for IR for doses >37.5 mg) | | [11]; [18,41,42][Level of evidence: I]
Serotonin/norepinephrine reuptake inhibitor | Duloxetine | 30 mg qam x 1 wk, then 60 mg qam | Equivalent to escitalopram (10 mg qam x 1 week, then 20 mg qam) in reducing hot flash severity and frequency and depressive symptoms | [43][Level of evidence: I]
Alpha-2 antagonist antidepressant | Mirtazapine | 7.5–30 mg qhs | Small pilot trial; target dose, 15–30 mg | [44][Level of evidence: II]
Anticonvulsant/GABA analogue | Gabapentin | Initial, 300 mg qhs; titrate up to 900 mg/d in divided doses | Mixed results depending on comparator group; studied in men and women | [22-24,26][Level of evidence: I]
Anticonvulsant/GABA analogue | Pregabalin | 50 mg qhs, then 50–150 mg PO bid | Titrations should be made weekly, to a target dose of 75 mg PO bid | [11]; [27][Level of evidence: I]
Alpha-2 adrenergic agonist | Clonidine | 0.1 mg/24 h transdermal; 0.1 mg PO q24h | Sudden cessation can result in significant hypertension; no efficacy demonstrated in men with postorchiectomy hot flashes | [31,45][Level of evidence: I]

bid = twice a day; CR = controlled release; ER = extended release; GABA = gamma-aminobutyric acid; IR = immediate release; PO = by mouth; qam = every morning; qhs = once daily at bedtime; VMS = vasomotor symptoms.

If nighttime hot flashes or night sweats are a particular problem without causing much bother during daytime, strategies to simultaneously improve sleep and hot flashes are in order. Limited data exist related to effective treatments that can target both symptoms. One pilot trial evaluated mirtazapine (a tetracyclic antidepressant that mainly affects serotonin) for hot flashes because it is often prescribed for sleep difficulties. Twenty-two women received mirtazapine titrated up to 30 mg per day at bedtime over a 3-week period; then they could choose 15 mg or 30 mg at bedtime daily for the fourth week. Hot flashes were reduced by approximately 53% in this nonrandomized trial, and women were statistically significantly satisfied with their hot flash control.[44] However, only 16 of the 22 women stayed on the agent for the entire study period because of excessive grogginess. Although this agent could be further studied in a larger randomized trial, it would be particularly important to evaluate the risk/benefit ratio.

In the short term, side effects of antidepressant agents in the doses used to treat hot flashes are minimal and primarily include:

- Nausea.
- Sedation.
- Dry mouth.
- Appetite suppression or stimulation.

In the long term, the prevalence of decreased sexual function with the use of SSRIs at doses for treating hot flashes is not known. The anticonvulsants gabapentin and pregabalin can cause sedation, dizziness, and difficulty concentrating, while clonidine can cause dry mouth, sedation, constipation, and insomnia.[25,27,46][Level of evidence: I] Patients respond as individuals to both the efficacy and the toxicity of various medications. Therefore, careful assessment and tailored treatment chosen collaboratively by the provider and patient are needed.

Data indicate that if a medication does not help an individual, switching to another medication—whether a different antidepressant or gabapentin—may be worthwhile. A randomized phase III trial (NCCTG-N03C5 (https://www.cancer.gov/clinicaltrials/NCT00087399)) examined gabapentin alone versus gabapentin with an antidepressant in women who had inadequate control of their hot flashes with an antidepressant alone.[47][Level of evidence: I] Gabapentin use resulted in an approximately 50% median reduction in hot flash frequency and score, regardless of whether the antidepressant was continued. In other words, for women who were using antidepressants exclusively to manage hot flashes that were inadequately controlled, initiation of gabapentin with discontinuation of the antidepressant produced results equal to those obtained with combined therapy, resulting in the need for fewer medications. Similarly, in a pilot study of women receiving inadequate benefit from venlafaxine for hot flash reduction, switching to open-label citalopram, 20 mg per day, resulted in a 50% reduction in hot flash frequency and score.[48]

### Drug Interactions

Many SSRIs can inhibit the cytochrome P450 enzymes involved in the metabolism of tamoxifen, which is commonly used in the treatment of breast cancer. When SSRIs are used, drug-drug interactions are noted. Tamoxifen is metabolized by the cytochrome P450 enzyme system, specifically CYP2D6. Wild-type CYP2D6 metabolizes tamoxifen to an active metabolite, 4-hydroxy-N-desmethyl-tamoxifen, also known as endoxifen. A prospective trial evaluating the effects on tamoxifen metabolism of the coadministration of tamoxifen and paroxetine, a CYP2D6 inhibitor, found that paroxetine coadministration resulted in decreased concentrations of endoxifen. The magnitude of decrease was greater in women with the wild-type CYP2D6 genotype than in those with a variant genotype (P = .03).[49][Level of evidence: II]

In a prospective observational study of 80 women initiating adjuvant tamoxifen therapy for newly diagnosed breast cancer, variant CYP2D6 genotypes and concomitant use of SSRI CYP2D6 inhibitors resulted in reduced endoxifen levels. Variant CYP2D6 genotypes do not produce functional CYP2D6 enzymes.[50][Level of evidence: II] Since this study was published, several researchers have evaluated the clinical implications of this finding.[51];[52-54][Level of evidence: II] One study followed more than 1,300 women for a median of 6.3 years and concluded that women who were poor metabolizers or heterozygous extensive/intermediate metabolizers (hence, less CYP2D6 activity) had higher rates of breast cancer recurrence, worse event-free survival, and worse disease-free survival than women who were extensive metabolizers.[53] Similarly, authors of a retrospective cohort study of more than 2,400 women in Ontario, Canada, who were being treated with tamoxifen and had overlapping treatment with an SSRI concluded that women who concomitantly used paroxetine and tamoxifen had an increased risk of death that was proportionate to the amount of time they used these agents together.[54][Level of evidence: II]

The clinical implications of these changes and of other CYP2D6 genotypes [55] have not yet been elucidated, but the pharmacokinetic interaction between tamoxifen and the newer antidepressants used to treat hot flashes merits further study.[56] Likewise, the risk of soy phytoestrogen use on breast cancer recurrence and/or progression has not yet been clarified. Soy phytoestrogens are weak estrogens found in plant foods. In vitro models suggest that these compounds have a biphasic effect on mammary cell proliferation that is dependent on intracellular concentrations of phytoestrogen and estradiol.[57]

### Information Specific to Men

Data are scant regarding the pathophysiology and management of hot flashes in men with prostate cancer. The rate of hot flashes in men receiving androgen deprivation therapy is approximately 75%.[58] The limited data suggest that hot flashes in men are related to changes in sex hormone levels that cause instability in the hypothalamic thermoregulatory center. This is analogous to the proposed mechanism of hot flashes that occur in women. As in women with breast cancer, hot flashes impair the quality of life for men with prostate cancer who are receiving androgen deprivation therapy. The vasodilatory neuropeptide, calcitonin gene–related peptide, may be instrumental in the genesis of hot flashes.[58]

In a prespecified secondary analysis of a prostate cancer clinical trial, 93% of men receiving 12 months of androgen deprivation therapy experienced hot flashes. The hot flashes occurred at castrate levels of testosterone, and cessation of hot flashes preceded full recovery of testosterone in most men, with 99% of men reporting resolution of hot flashes.[59][Level of evidence: I]

Cognitive behavioral therapy (CBT) has been studied for the treatment of hot flashes in men undergoing androgen deprivation therapy for prostate cancer.[60][Level of evidence: I] Patients were randomly assigned to a guided self-help CBT regimen, which included a booklet and CD with relaxation and breathing exercises, or to treatment as usual. At 6 weeks, those assigned to CBT experienced a statistically significant 40% reduction in hot flash/night sweat symptoms versus a 12% reduction in patients who received treatment as usual. Symptom reduction continued but was not statistically significant at 32 weeks. Adherence to CBT was good, with 88% reading all or more than half of the booklet and 79% using the relaxation CD.

With the exception of clonidine, the agents used to treat hot flashes in women have shown similar efficacy in men. For more information, see the Other Pharmacological Interventions section.Treatment modalities for men have included the following:[61]

- Estrogens.
- Progesterone.
- SSRIs.
- Gabapentin.

One large, multisite study from France [62] randomly assigned men who were taking leuprorelin for prostate cancer to receive venlafaxine, 75 mg; cyproterone acetate (an antiandrogen), 100 mg; or medroxyprogesterone acetate, 20 mg, when they reported at least 14 hot flashes per week. All three treatments significantly reduced hot flashes at 8 weeks, with cyproterone acetate resulting in a 100% median reduction, medroxyprogesterone resulting in a 97% reduction, and venlafaxine resulting in a 57% reduction. More adverse events were reported with cyproterone acetate, including one serious adverse event (dyspnea) attributable to the drug. Venlafaxine was not associated with any serious adverse events and overall had a 20% adverse event rate. Medroxyprogesterone was the best-tolerated drug, with an adverse event rate of 12%, but with one serious event, urticaria. The most frequent side effects for all agents were gastrointestinal issues, including nausea, constipation, diarrhea, and abdominal pain.[62]

Based on its efficacy in women, the combination of venlafaxine and soy was studied for hot flash reduction in androgen-deprived men.[63][Level of evidence: I] Patients were randomly assigned to receive venlafaxine with soy protein, venlafaxine with milk protein placebo, soy protein with placebo, or dual placebos during a 12-week period. The number and severity of hot flashes fell for all arms during the study period, but there was no significant difference between the arms. The authors concluded that neither agent should be used to treat hot flashes in men, that there is a significant placebo effect in the study of hot flash treatment, and that agents demonstrating success for hot flashes in women may not be successful in men.

A small, multicenter, retrospective review evaluated the use of two doses of intramuscular medroxyprogesterone acetate (400 mg and 150 mg) as a single dose to treat and prevent hot flashes associated with luteinizing hormone-releasing hormone agonist therapy for prostate cancer.[14][Level of evidence: III] Of the 48 men studied, 91% experienced symptomatic improvement in hot flashes, and 46% experienced complete resolution of hot flashes. The trial was not powered to detect a difference between the two doses; however, the authors concluded that they would use the 400-mg dose.

Pilot studies of the efficacy of the SSRIs paroxetine and fluvoxamine suggest that these drugs decrease the frequency and severity of hot flashes in men with prostate cancer.[64,65] As in women with hormonally sensitive tumors, there are concerns about the effects of hormone use on the outcome of prostate cancer, in addition to other well-described side effects.[58]

### Cognitive and Behavioral Methods

Comprehensive nonpharmacological interventions have been developed and evaluated for their ability to reduce hot flashes, night sweats, and the related perception of burden or problems. These interventions have typically included the following:[66-69]

- Psychoeducation about managing general symptoms, including stress, anxiety, and sexual and other menopausal concerns.
- Relaxation exercises, including slow, deep breathing, called paced breathing.
- Cognitive restructuring that addresses catastrophizing, negative beliefs, and avoidance behaviors.

Behavioral interventions as a primary or adjunctive modality may also play a role in hot flash management. Core body temperature has been shown to increase before a hot flash;[70] therefore, interventions that control body temperature could improve hot flash management. Some methods of controlling body temperature include the use of the following:

- Loose-fitting cotton clothing.
- Fans and open windows to keep air circulating.

Since serotonin may be involved as a central hot flash trigger, behavioral interventions such as stress management may modulate serotonin, causing a decrease in hot flashes.

Relaxation training and paced breathing were initially found to decrease hot flash intensity by as much as 40% to 50% in controlled pilot trials;[71,72] however, randomized trials with control arms using a different pace of breathing have not demonstrated significant benefit for paced-breathing interventions.[73,74]

Three large studies [67-69] of similar interventions have been completed using no treatment, usual care, or wait-list control comparison groups. While all of the studies demonstrated significant reductions in problem ratings or bother ratings related to hot flashes and night sweats, none showed actual reductions in hot flash frequency. Only one of the three studies demonstrated some significant improvements in night sweats at some data points.[68] Similar results were seen in a large trial of Internet-based CBT with and without therapist support.[75][Level of evidence: I] Cognitive behavioral interventions may be an important addition to pharmacological treatment to improve a patient’s symptoms related to hot flashes. However, data have not supported the sole use of CBT for reducing hot flashes.

Medical hypnosis is a newer intervention for hot flashes that has been shown to be helpful. In medical hypnosis, the provider facilitates a deep relaxation and trance state in the patient and gives suggestions to the subconscious to mitigate the symptom or problem being addressed. For hot flashes, medical hypnosis uses cooling suggestions and stress reduction to prevent rises in core body temperature and to decrease sympathetic activation. Based on strong pilot data, a randomized controlled trial of 187 postmenopausal women used an attention-control comparison and demonstrated significantly greater reductions in hot flashes in the hypnosis group than in the control group. The hypnosis intervention was 5 weeks long. At week 6, hot flash frequency was reduced in the hypnosis group by 64%, compared with a 9% reduction in the control group. At week 12, the reduction in the hypnosis group was 75%, compared with a 17% reduction in the control group.[76] Cancer survivors were not included in this study, but previous research has not demonstrated that interventions have a differential effect on hot flashes on the basis of breast cancer history.

Future research on hot flash management may be aided by the development of psychometrically sound assessment tools such as the Hot Flash Related Daily Interference Scale, which evaluates the impact of hot flashes on a wide variety of daily activities.[77]

### Integrative Approaches

#### Herbs and dietary supplements

Numerous herbs and dietary supplements are popularly used for hot flash reduction. Several of these substances have not been well studied in rigorous clinical trials. Furthermore, the biological activity of various over-the-counter supplements has yet to be determined and is far from standardized. Some of the more well-studied agents include vitamin E, soy phytoestrogen, and black cohosh.

Vitamin E, 400 IU twice a day, appears to confer a modest reduction in hot flashes that is only slightly better than that seen with placebo. The reduction in hot flashes is roughly 35% to 40%.[78,79][Level of evidence: I]

Soy is a dietary supplement of interest for decreasing menopausal symptoms and breast cancer. The interest comes primarily from association studies of a high-soy diet and decreased breast cancer/menopausal symptoms in Asia. Soy is rich in isoflavones, which are part of a much larger class of plant compounds called flavonoids. Among the isoflavones in soy products are three compounds that are responsible for hormonal effects: genistein, daidzein, and glycitein.

Isoflavones are often referred to as phytoestrogens or plant-based estrogens because they have been shown, in cell line and animal studies, to bind with the estrogen receptor.[80]

There is some confusion about the mechanisms of action and safety of these plant-based estrogens. Isoflavones have properties that can cause estrogen-like effects in some cells, for example, causing them to proliferate (divide and grow). But in other cells, isoflavones can stop or block estrogen effects, causing unwanted cells to not grow or die. There is continuing debate about the following questions:[81]

- What doses and types of soy products inhibit estrogen as a growth factor?
- Under what circumstances do soy products inhibit estrogen as a growth factor?
- In what doses or circumstances do soy products promote estrogen-related growth?

Definitive answers to these questions are not known, but phytoestrogens continue to be investigated for their chemopreventive properties. On the other hand, soy has been well studied in numerous randomized, placebo-controlled trials for its effects on reducing hot flashes.[82-86][Level of evidence: I] Most trials show that soy is no better than placebo in reducing hot flashes.[87][Level of evidence: I];[88] While clinical evidence indicates the general safety of soy products, there are no compelling data that would inspire the use of soy for hot flash management.

Similarly, randomized placebo-controlled trials of black cohosh have found that it is no better than a placebo in reducing hot flashes.[86,89,90][Level of evidence: I] Furthermore, a meta-analysis that included 14 randomized controlled trials of black cohosh concluded there is a lack of evidence to support its use in the treatment of hot flashes.[91] For more information, see Black Cohosh.

Black cohosh used to be thought of as having estrogenic properties, but it is now known to act on serotonin receptors. One study evaluated black cohosh, red clover, estrogen and progesterone, and placebo in a randomized double-blind trial.[92][Level of evidence: I] Each treatment arm was small (n = 22); however, over 12 months, hot flashes were reduced 34% by black cohosh, 57% by red clover, 63% by placebo, and 94% by hormone therapy. Of note, adherence rates were approximately 89% across the four groups during this long-term study. At 12 months, physiological markers such as endometrial thickness, estradiol, estrone, follicle-stimulating hormone, sex hormone–binding globulin, and liver function were not statistically different for those who took either red clover or black cohosh, compared with those who took a placebo. However, because these groups were small, the power for this secondary analysis was not reported, and it was likely underpowered to detect important differences.

Flaxseed is a plant that is part of the genus Linum, native to the area around the eastern Mediterranean and India. Flaxseed is a rich source of fiber, lignans, and omega-3 fatty acids. Lignans found in flaxseed are secoisolariciresinol diglucoside and alpha-linolenic acid. Lignans are a type of phytoestrogen (plant estrogen) that, like soy, are thought to have estrogen agonist-antagonist effects as well as antioxidant properties. Lignans are converted by colonic bacteria to enterodiol and enterolactone, which are metabolites believed to have important physiological properties, such as decreasing cell proliferation and inhibiting aromatase, 5-alpha reductase, and 17-beta hydroxysteroid activity. Cell line studies have shown properties of aromatase inhibition with enterolactone but less so with enterodiol.[93] It is thought that these properties can reduce the risk of hormone-sensitive cancers.[94-96] In addition, studies have shown that flaxseed can reduce estrogen levels through excretion in the urine.[97,98]

Following preliminary test results of flaxseed for its effect on hot flashes and related endpoints,[99,100][Level of evidence: I] an open-label pilot study evaluated 40 g of flaxseed in decreasing hot flashes. This study of 30 women showed a 57% reduction in hot flash scores and a 50% reduction in hot flash frequency over a 6-week period.[101] However, a follow-up phase III, randomized, controlled trial conducted by the North Central Cancer Treatment Group with 188 women failed to show any benefit of 410 mg of lignans in a flaxseed bar over placebo.[102][Level of evidence: I]

Similarly, on the basis of two pilot studies suggesting that magnesium oxide supplementation significantly reduced hot flashes, a double-blind, randomized, placebo-controlled trial of magnesium oxide, 800 or 1,200 mg daily, versus placebo was conducted in postmenopausal women with a history of breast cancer and symptomatic hot flashes.[103][Level of evidence: I] No benefit was observed for magnesium oxide.

Many other plants and natural products are advertised or marketed as remedies for hot flashes. Some of these products, such as red clover, contain phytoestrogens, and some have unknown properties. The agents include dong quai, milk thistle, licorice, and chaste tree berry. There is incomplete understanding of the biology of these agents and whether taking them would impact breast cancer risk or recurrence in a negative or positive way. Data suggest that these plants have different effects, dependent not only on the dose used but also on a woman's hormone environment when she takes them. Little is known about these agents, and caution is needed with respect to taking them if a woman is to avoid estrogen supplementation.[104-107]

#### Acupuncture

Pilot and randomized sham trials have evaluated the use of acupuncture to treat hot flashes.[108-112][Level of evidence: I] Research in acupuncture is difficult to conduct, owing to the lack of novel methodology—specifically, the conundrum of what serves as an adequate control arm. In addition, the philosophy surrounding acupuncture practice is quite individualized, in that two women experiencing hot flashes would not necessarily receive the same treatment. It would be important to study acupuncture utilizing relevant clinical procedures; so far, acceptable research methods to accomplish this are lacking. Therefore, the data on the effect of acupuncture on hot flashes are quite mixed. However, a 2016 meta-analysis of 12 trials studying acupuncture for the treatment of hot flashes in patients with breast cancer showed limited or no effects.[113] Included trials ranged in size from 10 to 84 patients, with 5 to 16 treatment sessions and 1 to 24 months of follow-up. Comparator arms included hormone therapy, relaxation techniques, sham acupuncture, and antidepressants. The authors concluded that acupuncture failed to demonstrate a significant effect on the frequency of hot flashes in a population of breast cancer patients.

In contrast, a randomized controlled trial that was not included in the 2016 meta-analysis showed a statistically significant reduction in hot flash score with acupuncture.[114][Level of evidence: I] The trial randomly assigned women to ten acupuncture sessions plus enhanced self-care versus enhanced self-care alone. Women were included if they had breast cancer; at least moderate-level hot flashes, defined as six or more hot flashes a day; and/or a score of 15 or higher on the Greene Climacteric Scale. Random assignment to acupuncture resulted in fewer hot flashes and higher quality of life. The reduction in hot flash score was maintained through the 3- and 6-month follow-up visits.

In a randomized controlled trial, breast cancer survivors with hot flashes (120 women) were randomly assigned to receive electroacupuncture (using a transcutaneous electrical nerve stimulation unit to induce a current between two acupuncture points) or gabapentin, 900 mg daily, with sham electroacupuncture (needles that did not penetrate the skin and without electricity) and placebo capsules as controls.[24] Electroacupuncture produced the greatest reduction in hot flash symptoms, followed by sham acupuncture, gabapentin, and placebo capsules. In a separately published, prespecified secondary analysis of sleep outcomes in women assigned to the active treatment arms, electroacupuncture was comparable to gabapentin for improving sleep quality; significant associations were seen between reduction in hot flash severity and frequency and improved sleep latency and sleep quality in the full sample.[115]

For more information, see the Vasomotor symptoms section in Acupuncture.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Freedman RR, Blacker CM: Estrogen raises the sweating threshold in postmenopausal women with hot flashes. Fertil Steril 77 (3): 487-90, 2002.11872200 21861737
Pritchard KI: Hormone replacement in women with a history of breast cancer. Oncologist 6 (4): 353-62, 2001.11524554
Writing Group for the Women's Health Initiative Investigators: Risks and benefits of estrogen plus progestin in healthy postmenopausal women: principal results From the Women's Health Initiative randomized controlled trial. JAMA 288 (3): 321-33, 2002.12117397 22113237
Chlebowski RT, Hendrix SL, Langer RD, et al.: Influence of estrogen plus progestin on breast cancer and mammography in healthy postmenopausal women: the Women's Health Initiative Randomized Trial. JAMA 289 (24): 3243-53, 2003.12824205 22708575
Li CI, Malone KE, Porter PL, et al.: Relationship between long durations and different regimens of hormone therapy and risk of breast cancer. JAMA 289 (24): 3254-63, 2003.12824206 22708576
Vassilopoulou-Sellin R, Asmar L, Hortobagyi GN, et al.: Estrogen replacement therapy after localized breast cancer: clinical outcome of 319 women followed prospectively. J Clin Oncol 17 (5): 1482-7, 1999.10334534
Decker DA, Pettinga JE, VanderVelde N, et al.: Estrogen replacement therapy in breast cancer survivors: a matched-controlled series. Menopause 10 (4): 277-85, 2003 Jul-Aug.12851510
Goodwin JW, Green SJ, Moinpour CM, et al.: Phase III randomized placebo-controlled trial of two doses of megestrol acetate as treatment for menopausal symptoms in women with breast cancer: Southwest Oncology Group Study 9626. J Clin Oncol 26 (10): 1650-6, 2008.18375894
Loprinzi CL, Michalak JC, Quella SK, et al.: Megestrol acetate for the prevention of hot flashes. N Engl J Med 331 (6): 347-52, 1994.8028614 94301346
Bertelli G, Venturini M, Del Mastro L, et al.: Intramuscular depot medroxyprogesterone versus oral megestrol for the control of postmenopausal hot flashes in breast cancer patients: a randomized study. Ann Oncol 13 (6): 883-8, 2002.12123333 22118285
Lexicomp Online. Hudson, Ohio: Lexi-Comp, Inc., 2025. Available online with subscription (https://www.wolterskluwer.com/en/solutions/uptodate/enterprise/lexidrug). Last accessed Jan. 15, 2025.
Joffe H, Guthrie KA, LaCroix AZ, et al.: Low-dose estradiol and the serotonin-norepinephrine reuptake inhibitor venlafaxine for vasomotor symptoms: a randomized clinical trial. JAMA Intern Med 174 (7): 1058-66, 2014.24861828
Loprinzi CL, Levitt R, Barton D, et al.: Phase III comparison of depomedroxyprogesterone acetate to venlafaxine for managing hot flashes: North Central Cancer Treatment Group Trial N99C7. J Clin Oncol 24 (9): 1409-14, 2006.16505409
Langenstroer P, Kramer B, Cutting B, et al.: Parenteral medroxyprogesterone for the management of luteinizing hormone releasing hormone induced hot flashes in men with advanced prostate cancer. J Urol 174 (2): 642-5, 2005.16006929
Barton D, Loprinzi CL: Making sense of the evidence regarding nonhormonal treatments for hot flashes. Clin J Oncol Nurs 8 (1): 39-42, 2004.14983762
Loprinzi CL, Stearns V, Barton D: Centrally active nonhormonal hot flash therapies. Am J Med 118 (Suppl 12B): 118-23, 2005.16414336
Loprinzi CL, Barton DL, Sloan JA, et al.: Mayo Clinic and North Central Cancer Treatment Group hot flash studies: a 20-year experience. Menopause 15 (4 Pt 1): 655-60, 2008 Jul-Aug.18427355
Loprinzi CL, Kugler JW, Sloan JA, et al.: Venlafaxine in management of hot flashes in survivors of breast cancer: a randomised controlled trial. Lancet 356 (9247): 2059-63, 2000.11145492 21017708
Stearns V, Beebe KL, Iyengar M, et al.: Paroxetine controlled release in the treatment of menopausal hot flashes: a randomized controlled trial. JAMA 289 (21): 2827-34, 2003.12783913 22669281
Capriglione S, Plotti F, Montera R, et al.: Role of paroxetine in the management of hot flashes in gynecological cancer survivors: Results of the first randomized single-center controlled trial. Gynecol Oncol 143 (3): 584-588, 2016.27751589
Stearns V, Slack R, Greep N, et al.: Paroxetine is an effective treatment for hot flashes: results from a prospective randomized clinical trial. J Clin Oncol 23 (28): 6919-30, 2005.16192581
Bordeleau L, Pritchard KI, Loprinzi CL, et al.: Multicenter, randomized, cross-over clinical trial of venlafaxine versus gabapentin for the management of hot flashes in breast cancer survivors. J Clin Oncol 28 (35): 5147-52, 2010.21060031
Loprinzi CL, Dueck AC, Khoyratty BS, et al.: A phase III randomized, double-blind, placebo-controlled trial of gabapentin in the management of hot flashes in men (N00CB). Ann Oncol 20 (3): 542-9, 2009.19129205
Mao JJ, Bowman MA, Xie SX, et al.: Electroacupuncture Versus Gabapentin for Hot Flashes Among Breast Cancer Survivors: A Randomized Placebo-Controlled Trial. J Clin Oncol 33 (31): 3615-20, 2015.26304905
Pandya KJ, Morrow GR, Roscoe JA, et al.: Gabapentin for hot flashes in 420 women with breast cancer: a randomised double-blind placebo-controlled trial. Lancet 366 (9488): 818-24, 2005 Sep 3-9.16139656
Biglia N, Sgandurra P, Peano E, et al.: Non-hormonal treatment of hot flushes in breast cancer survivors: gabapentin vs. vitamin E. Climacteric 12 (4): 310-8, 2009.19415540
Loprinzi CL, Qin R, Baclueva EP, et al.: Phase III, randomized, double-blind, placebo-controlled evaluation of pregabalin for alleviating hot flashes, N07C1. J Clin Oncol 28 (4): 641-7, 2010.19901102
Barton DL, LaVasseur BI, Sloan JA, et al.: Phase III, placebo-controlled trial of three doses of citalopram for the treatment of hot flashes: NCCTG trial N05C9. J Clin Oncol 28 (20): 3278-83, 2010.20498389
Loprinzi CL, Sloan JA, Perez EA, et al.: Phase III evaluation of fluoxetine for treatment of hot flashes. J Clin Oncol 20 (6): 1578-83, 2002.11896107 21893324
Goldberg RM, Loprinzi CL, O'Fallon JR, et al.: Transdermal clonidine for ameliorating tamoxifen-induced hot flashes. J Clin Oncol 12 (1): 155-8, 1994.8270972 94096052
Pandya KJ, Raubertas RF, Flynn PJ, et al.: Oral clonidine in postmenopausal patients with breast cancer experiencing tamoxifen-induced hot flashes: a University of Rochester Cancer Center Community Clinical Oncology Program study. Ann Intern Med 132 (10): 788-93, 2000.10819701
Barton D, Loprinzi C, Diekmann B, et al.: Citalopram for hot flashes: “the rest of the story”. [Abstract] Support Care Cancer 16 (6): A-20-201, 730, 2008.
Pérez DG, Loprinzi CL, Sloan J, et al.: Pilot evaluation of bupropion for the treatment of hot flashes. J Palliat Med 9 (3): 631-7, 2006.16752968
Bardia A, Thompson S, Atherton PJ, et al.: Pilot evaluation of aprepitant for the treatment of hot flashes. Support Cancer Ther 3 (4): 240-6, 2006.18632500
Barton DL, Loprinzi CL, Atherton P, et al.: Phase II Evaluation of Desipramine for the Treatment of Hot Flashes. Support Cancer Ther 4 (4): 219-24, 2007.18632520
Kimmick GG, Lovato J, McQuellon R, et al.: Randomized, double-blind, placebo-controlled, crossover study of sertraline (Zoloft) for the treatment of hot flashes in women with early stage breast cancer taking tamoxifen. Breast J 12 (2): 114-22, 2006 Mar-Apr.16509835
Gordon PR, Kerwin JP, Boesen KG, et al.: Sertraline to treat hot flashes: a randomized controlled, double-blind, crossover trial in a general population. Menopause 13 (4): 568-75, 2006 Jul-Aug.16837878
Wu MF, Hilsenbeck SG, Tham YL, et al.: The efficacy of sertraline for controlling hot flashes in women with or at high risk of developing breast cancer. Breast Cancer Res Treat 118 (2): 369-75, 2009.19495957
Carpenter JS, Guthrie KA, Larson JC, et al.: Effect of escitalopram on hot flash interference: a randomized, controlled trial. Fertil Steril 97 (6): 1399-404.e1, 2012.22480818
Freeman EW, Guthrie KA, Caan B, et al.: Efficacy of escitalopram for hot flashes in healthy menopausal women: a randomized controlled trial. JAMA 305 (3): 267-74, 2011.21245182
Loibl S, Schwedler K, von Minckwitz G, et al.: Venlafaxine is superior to clonidine as treatment of hot flashes in breast cancer patients--a double-blind, randomized study. Ann Oncol 18 (4): 689-93, 2007.17229772
Buijs C, Mom CH, Willemse PH, et al.: Venlafaxine versus clonidine for the treatment of hot flashes in breast cancer patients: a double-blind, randomized cross-over study. Breast Cancer Res Treat 115 (3): 573-80, 2009.18670875
Biglia N, Bounous VE, Susini T, et al.: Duloxetine and escitalopram for hot flushes: efficacy and compliance in breast cancer survivors. Eur J Cancer Care (Engl) 27 (1): , 2018.26936232
Perez DG, Loprinzi CL, Barton DL, et al.: Pilot evaluation of mirtazapine for the treatment of hot flashes. J Support Oncol 2 (1): 50-6, 2004 Jan-Feb.15330372
Boekhout AH, Vincent AD, Dalesio OB, et al.: Management of hot flashes in patients who have breast cancer with venlafaxine and clonidine: a randomized, double-blind, placebo-controlled trial. J Clin Oncol 29 (29): 3862-8, 2011.21911720
Guttuso T, Kurlan R, McDermott MP, et al.: Gabapentin's effects on hot flashes in postmenopausal women: a randomized controlled trial. Obstet Gynecol 101 (2): 337-45, 2003.12576259
Loprinzi CL, Kugler JW, Barton DL, et al.: Phase III trial of gabapentin alone or in conjunction with an antidepressant in the management of hot flashes in women who have inadequate control with an antidepressant alone: NCCTG N03C5. J Clin Oncol 25 (3): 308-12, 2007.17146104
Loprinzi CL, Flynn PJ, Carpenter LA, et al.: Pilot evaluation of citalopram for the treatment of hot flashes in women with inadequate benefit from venlafaxine. J Palliat Med 8 (5): 924-30, 2005.16238505
Stearns V, Johnson MD, Rae JM, et al.: Active tamoxifen metabolite plasma concentrations after coadministration of tamoxifen and the selective serotonin reuptake inhibitor paroxetine. J Natl Cancer Inst 95 (23): 1758-64, 2003.14652237
Jin Y, Desta Z, Stearns V, et al.: CYP2D6 genotype, antidepressant use, and tamoxifen metabolism during adjuvant breast cancer treatment. J Natl Cancer Inst 97 (1): 30-9, 2005.15632378
Desmarais JE, Looper KJ: Interactions between tamoxifen and antidepressants via cytochrome P450 2D6. J Clin Psychiatry 70 (12): 1688-97, 2009.20141708
Bijl MJ, van Schaik RH, Lammers LA, et al.: The CYP2D6*4 polymorphism affects breast cancer survival in tamoxifen users. Breast Cancer Res Treat 118 (1): 125-30, 2009.19189212
Schroth W, Goetz MP, Hamann U, et al.: Association between CYP2D6 polymorphisms and outcomes among women with early stage breast cancer treated with tamoxifen. JAMA 302 (13): 1429-36, 2009.19809024
Kelly CM, Juurlink DN, Gomes T, et al.: Selective serotonin reuptake inhibitors and breast cancer mortality in women receiving tamoxifen: a population based cohort study. BMJ 340: c693, 2010.20142325
Bonanni B, Macis D, Maisonneuve P, et al.: Polymorphism in the CYP2D6 tamoxifen-metabolizing gene influences clinical effect but not hot flashes: data from the Italian Tamoxifen Trial. J Clin Oncol 24 (22): 3708-9; author reply 3709, 2006.16877740
Goetz MP, Loprinzi CL: A hot flash on tamoxifen metabolism. J Natl Cancer Inst 95 (23): 1734-5, 2003.14652227
This P, De La Rochefordière A, Clough K, et al.: Phytoestrogens after breast cancer. Endocr Relat Cancer 8 (2): 129-34, 2001.11397668
Spetz AC, Zetterlund EL, Varenhorst E, et al.: Incidence and management of hot flashes in prostate cancer. J Support Oncol 1 (4): 263-6, 269-70, 272-3; discussion 267-8, 271-2, 2003 Nov-Dec.15334868
Dosani M, Morris WJ, Tyldesley S, et al.: The Relationship between Hot Flashes and Testosterone Recovery after 12 Months of Androgen Suppression for Men with Localised Prostate Cancer in the ASCENDE-RT Trial. Clin Oncol (R Coll Radiol) 29 (10): 696-701, 2017.28712786
Stefanopoulou E, Yousaf O, Grunfeld EA, et al.: A randomised controlled trial of a brief cognitive behavioural intervention for men who have hot flushes following prostate cancer treatment (MANCAN). Psychooncology 24 (9): 1159-66, 2015.25753889
Moraska AR, Atherton PJ, Szydlo DW, et al.: Gabapentin for the management of hot flashes in prostate cancer survivors: a longitudinal continuation Study-NCCTG Trial N00CB. J Support Oncol 8 (3): 128-32, 2010 May-Jun.20552926
Irani J, Salomon L, Oba R, et al.: Efficacy of venlafaxine, medroxyprogesterone acetate, and cyproterone acetate for the treatment of vasomotor hot flushes in men taking gonadotropin-releasing hormone analogues for prostate cancer: a double-blind, randomised trial. Lancet Oncol 11 (2): 147-54, 2010.19963436
Vitolins MZ, Griffin L, Tomlinson WV, et al.: Randomized trial to assess the impact of venlafaxine and soy protein on hot flashes and quality of life in men with prostate cancer. J Clin Oncol 31 (32): 4092-8, 2013.24081940
Loprinzi CL, Barton DL, Carpenter LA, et al.: Pilot evaluation of paroxetine for treating hot flashes in men. Mayo Clin Proc 79 (10): 1247-51, 2004.15473404
Nishiyama T, Kanazawa S, Watanabe R, et al.: Influence of hot flashes on quality of life in patients with prostate cancer treated with androgen deprivation therapy. Int J Urol 11 (9): 735-41, 2004.15379937
Tremblay A, Sheeran L, Aranda SK: Psychoeducational interventions to alleviate hot flashes: a systematic review. Menopause 15 (1): 193-202, 2008 Jan-Feb.17589375
Mann E, Smith MJ, Hellier J, et al.: Cognitive behavioural treatment for women who have menopausal symptoms after breast cancer treatment (MENOS 1): a randomised controlled trial. Lancet Oncol 13 (3): 309-18, 2012.22340966
Ayers B, Smith M, Hellier J, et al.: Effectiveness of group and self-help cognitive behavior therapy in reducing problematic menopausal hot flushes and night sweats (MENOS 2): a randomized controlled trial. Menopause 19 (7): 749-59, 2012.22336748
Duijts SF, van Beurden M, Oldenburg HS, et al.: Efficacy of cognitive behavioral therapy and physical exercise in alleviating treatment-induced menopausal symptoms in patients with breast cancer: results of a randomized, controlled, multicenter trial. J Clin Oncol 30 (33): 4124-33, 2012.23045575
Freedman RR, Woodward S: Core body temperature during menopausal hot flushes. Fertil Steril 65 (6): 1141-44, 1996.8641487
Freedman RR: Hot flashes: behavioral treatments, mechanisms, and relation to sleep. Am J Med 118 (Suppl 12B): 124-30, 2005.16414337
Wijma K, Melin A, Nedstrand E, et al.: Treatment of menopausal symptoms with applied relaxation: a pilot study. J Behav Ther Exp Psychiatry 28 (4): 251-61, 1997.9489686
Carpenter JS, Burns DS, Wu J, et al.: Paced respiration for vasomotor and other menopausal symptoms: a randomized, controlled trial. J Gen Intern Med 28 (2): 193-200, 2013.22936289
Sood R, Sood A, Wolf SL, et al.: Paced breathing compared with usual breathing for hot flashes. Menopause 20 (2): 179-84, 2013.22990758
Atema V, van Leeuwen M, Kieffer JM, et al.: Efficacy of Internet-Based Cognitive Behavioral Therapy for Treatment-Induced Menopausal Symptoms in Breast Cancer Survivors: Results of a Randomized Controlled Trial. J Clin Oncol 37 (10): 809-822, 2019.30763176
Elkins GR, Fisher WI, Johnson AK, et al.: Clinical hypnosis in the treatment of postmenopausal hot flashes: a randomized controlled trial. Menopause 20 (3): 291-8, 2013.23435026
Carpenter JS: The Hot Flash Related Daily Interference Scale: a tool for assessing the impact of hot flashes on quality of life following breast cancer. J Pain Symptom Manage 22 (6): 979-89, 2001.11738160 21602367
Barton DL, Loprinzi CL, Quella SK, et al.: Prospective evaluation of vitamin E for hot flashes in breast cancer survivors. J Clin Oncol 16 (2): 495-500, 1998.9469333
Ziaei S, Kazemnejad A, Zareai M: The effect of vitamin E on hot flashes in menopausal women. Gynecol Obstet Invest 64 (4): 204-7, 2007.17664882
Enderlin CA, Coleman EA, Stewart CB, et al.: Dietary soy intake and breast cancer risk. Oncol Nurs Forum 36 (5): 531-9, 2009.19726393
Anastasius N, Boston S, Lacey M, et al.: Evidence that low-dose, long-term genistein treatment inhibits oestradiol-stimulated growth in MCF-7 cells by down-regulation of the PI3-kinase/Akt signalling pathway. J Steroid Biochem Mol Biol 116 (1-2): 50-5, 2009.19406242
Quella SK, Loprinzi CL, Barton DL, et al.: Evaluation of soy phytoestrogens for the treatment of hot flashes in breast cancer survivors: A North Central Cancer Treatment Group Trial. J Clin Oncol 18 (5): 1068-74, 2000.10694559 20160753
Van Patten CL, Olivotto IA, Chambers GK, et al.: Effect of soy phytoestrogens on hot flashes in postmenopausal women with breast cancer: a randomized, controlled clinical trial. J Clin Oncol 20 (6): 1449-55, 2002.11896091 21893308
St Germain A, Peterson CT, Robinson JG, et al.: Isoflavone-rich or isoflavone-poor soy protein does not reduce menopausal symptoms during 24 weeks of treatment. Menopause 8 (1): 17-26, 2001 Jan-Feb.11201510
Nikander E, Kilkkinen A, Metsä-Heikkilä M, et al.: A randomized placebo-controlled crossover trial with phytoestrogens in treatment of menopause in breast cancer patients. Obstet Gynecol 101 (6): 1213-20, 2003.12798527
Newton KM, Reed SD, LaCroix AZ, et al.: Treatment of vasomotor symptoms of menopause with black cohosh, multibotanicals, soy, hormone therapy, or placebo: a randomized trial. Ann Intern Med 145 (12): 869-79, 2006.17179056
Reed SD, Newton KM, LaCroix AZ, et al.: Vaginal, endometrial, and reproductive hormone findings: randomized, placebo-controlled trial of black cohosh, multibotanical herbs, and dietary soy for vasomotor symptoms: the Herbal Alternatives for Menopause (HALT) Study. Menopause 15 (1): 51-8, 2008 Jan-Feb.18257142
Lethaby AE, Brown J, Marjoribanks J, et al.: Phytoestrogens for vasomotor menopausal symptoms. Cochrane Database Syst Rev (4): CD001395, 2007.17943751
Osmers R, Friede M, Liske E, et al.: Efficacy and safety of isopropanolic black cohosh extract for climacteric symptoms. Obstet Gynecol 105 (5 Pt 1): 1074-83, 2005.15863547
Pockaj BA, Gallagher JG, Loprinzi CL, et al.: Phase III double-blind, randomized, placebo-controlled crossover trial of black cohosh in the management of hot flashes: NCCTG Trial N01CC1. J Clin Oncol 24 (18): 2836-41, 2006.16782922
Fritz H, Seely D, McGowan J, et al.: Black cohosh and breast cancer: a systematic review. Integr Cancer Ther 13 (1): 12-29, 2014.23439657
Geller SE, Shulman LP, van Breemen RB, et al.: Safety and efficacy of black cohosh and red clover for the management of vasomotor symptoms: a randomized controlled trial. Menopause 16 (6): 1156-66, 2009 Nov-Dec.19609225
Wang C, Mäkelä T, Hase T, et al.: Lignans and flavonoids inhibit aromatase enzyme in human preadipocytes. J Steroid Biochem Mol Biol 50 (3-4): 205-12, 1994.8049151
Thompson LU, Chen JM, Li T, et al.: Dietary flaxseed alters tumor biological markers in postmenopausal breast cancer. Clin Cancer Res 11 (10): 3828-35, 2005.15897583
Thompson LU, Seidl MM, Rickard SE, et al.: Antitumorigenic effect of a mammalian lignan precursor from flaxseed. Nutr Cancer 26 (2): 159-65, 1996.8875553
Touillaud MS, Thiébaut AC, Fournier A, et al.: Dietary lignan intake and postmenopausal breast cancer risk by estrogen and progesterone receptor status. J Natl Cancer Inst 99 (6): 475-86, 2007.17374837
Haggans CJ, Hutchins AM, Olson BA, et al.: Effect of flaxseed consumption on urinary estrogen metabolites in postmenopausal women. Nutr Cancer 33 (2): 188-95, 1999.10368815
Haggans CJ, Travelli EJ, Thomas W, et al.: The effect of flaxseed and wheat bran consumption on urinary estrogen metabolites in premenopausal women. Cancer Epidemiol Biomarkers Prev 9 (7): 719-25, 2000.10919743
Lemay A, Dodin S, Kadri N, et al.: Flaxseed dietary supplement versus hormone replacement therapy in hypercholesterolemic menopausal women. Obstet Gynecol 100 (3): 495-504, 2002.12220769
Lewis JE, Nickell LA, Thompson LU, et al.: A randomized controlled trial of the effect of dietary soy and flaxseed muffins on quality of life and hot flashes during menopause. Menopause 13 (4): 631-42, 2006 Jul-Aug.16837885
Pruthi S, Thompson SL, Novotny PJ, et al.: Pilot evaluation of flaxseed for the management of hot flashes. J Soc Integr Oncol 5 (3): 106-12, 2007.17761129
Pruthi S, Qin R, Terstreip SA, et al.: A phase III, randomized, placebo-controlled, double-blind trial of flaxseed for the treatment of hot flashes: North Central Cancer Treatment Group N08C7. Menopause 19 (1): 48-53, 2012.21900849
Park H, Qin R, Smith TJ, et al.: North Central Cancer Treatment Group N10C2 (Alliance): a double-blind placebo-controlled study of magnesium supplements to reduce menopausal hot flashes. Menopause 22 (6): 627-32, 2015.25423327
Liu J, Burdette JE, Xu H, et al.: Evaluation of estrogenic activity of plant extracts for the potential treatment of menopausal symptoms. J Agric Food Chem 49 (5): 2472-9, 2001.11368622
Tamir S, Eizenberg M, Somjen D, et al.: Estrogenic and antiproliferative properties of glabridin from licorice in human breast cancer cells. Cancer Res 60 (20): 5704-9, 2000.11059763
Lau CB, Ho TC, Chan TW, et al.: Use of dong quai (Angelica sinensis) to treat peri- or postmenopausal symptoms in women with breast cancer: is it appropriate? Menopause 12 (6): 734-40, 2005 Nov-Dec.16278617
Rotem C, Kaplan B: Phyto-Female Complex for the relief of hot flushes, night sweats and quality of sleep: randomized, controlled, double-blind pilot study. Gynecol Endocrinol 23 (2): 117-22, 2007.17454163
Borud EK, Alraek T, White A, et al.: The Acupuncture on Hot Flushes Among Menopausal Women (ACUFLASH) study, a randomized controlled trial. Menopause 16 (3): 484-93, 2009 May-Jun.19423996
Hervik J, Mjåland O: Acupuncture for the treatment of hot flashes in breast cancer patients, a randomized, controlled trial. Breast Cancer Res Treat 116 (2): 311-6, 2009.18839306
Vincent A, Barton DL, Mandrekar JN, et al.: Acupuncture for hot flashes: a randomized, sham-controlled clinical study. Menopause 14 (1): 45-52, 2007 Jan-Feb.17019380
Borud EK, Alraek T, White A, et al.: The effect of TCM acupuncture on hot flushes among menopausal women (ACUFLASH) study: a study protocol of an ongoing multi-centre randomised controlled clinical trial. BMC Complement Altern Med 7: 6, 2007.17324253
Liljegren A, Gunnarsson P, Landgren BM, et al.: Reducing vasomotor symptoms with acupuncture in breast cancer patients treated with adjuvant tamoxifen: a randomized controlled trial. Breast Cancer Res Treat 135 (3): 791-8, 2012.21153699
Salehi A, Marzban M, Zadeh AR: Acupuncture for treating hot flashes in breast cancer patients: an updated meta-analysis. Support Care Cancer 24 (12): 4895-4899, 2016.27497608
Lesi G, Razzini G, Musti MA, et al.: Acupuncture As an Integrative Approach for the Treatment of Hot Flashes in Women With Breast Cancer: A Prospective Multicenter Randomized Controlled Trial (AcCliMaT). J Clin Oncol 34 (15): 1795-802, 2016.27022113
Garland SN, Xie SX, Li Q, et al.: Comparative effectiveness of electro-acupuncture versus gabapentin for sleep disturbances in breast cancer survivors with hot flashes: a randomized trial. Menopause 24 (5): 517-523, 2017.27875389

## Latest Updates to This Summary (01/15/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of hot flashes and night sweats. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Hot Flashes and Night Sweats are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- Edward B. Perry, MD (VA Connecticut Healthcare System)
- Rachel A. Pozzar, PhD, RN (Dana-Farber Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Hot Flashes and Night Sweats. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/hot-flashes-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389188]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).